# Childhood Thyroid Cancer (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood thyroid cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## What is childhood thyroid cancer?

Thyroid cancer in children is a rare cancer that forms in the thyroid, a butterfly-shaped gland at the base of the throat near the windpipe (also called the trachea). The thyroid gland has a right lobe and a left lobe that is connected by a thin piece of tissue called the isthmus. Although thyroid cancer can affect children of all ages, it's more common in adolescents and girls. It also occurs more often in White people than in Black people.

Children can also have thyroid nodules. A thyroid nodule is an abnormal growth of thyroid cells in the thyroid. The nodules may be solid or fluid-filled. Thyroid nodules usually don't cause symptoms or need treatment unless they become large enough that it is hard to swallow or breathe. Only one in five thyroid nodules become cancer.

Anatomy of the thyroid and parathyroid glands. The thyroid gland lies at the base of the throat near the trachea. It is shaped like a butterfly, with the right lobe and left lobe connected by a thin piece of tissue called the isthmus. The parathyroid glands are four pea-sized organs found in the neck near the thyroid. The thyroid and parathyroid glands make hormones.

Anatomy of the thyroid and parathyroid glands; drawing shows the thyroid gland at the base of the throat near the trachea. An inset shows the front and back views. The front view shows that the thyroid is shaped like a butterfly, with the right lobe and left lobe connected by a thin piece of tissue called the isthmus. The back view shows the four pea-sized parathyroid glands. The larynx is also shown.

The thyroid uses iodine, a mineral found in some foods and in iodized salt, to help make several hormones. Thyroid hormones:

- control heart rate, body temperature, and how quickly food is changed into energy (metabolism)
- control the amount of calcium in the blood

## Types of childhood thyroid cancer

There are four types of thyroid cancers:

- Papillary thyroid carcinoma is the most common type of thyroid cancer in children, occurring most often in teens. It usually affects both sides of the thyroid and often spreads to lymph nodes in the neck and sometimes the lungs.
- Follicular thyroid carcinoma usually forms in one area of the thyroid. It often spreads to the bone and lung but rarely spreads to the lymph nodes in the neck.
- Medullary thyroid cancer forms from parafollicular C cells in the thyroid. It is usually linked to a certain inherited change in the RET gene and multiple endocrine neoplasia type 2 (MEN 2) syndrome. It occurs most often in children aged 4 years and younger and may have spread to other parts of the body at the time of diagnosis. Children who have MEN2 syndrome may also be at risk of developing pheochromocytoma or hyperparathyroidism.
- Anaplastic thyroid cancer rarely occurs in children. Learn more at Anaplastic Thyroid Cancer (ATC) (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-endocrine-tumor/anaplastic-thyroid-cancer).

Papillary and follicular thyroid cancer are sometimes called differentiated thyroid cancer. Medullary and anaplastic thyroid cancer are sometimes called poorly differentiated or undifferentiated thyroid cancer.

Adenomas are a type of thyroid nodule that can grow very large and sometimes make hormones. Adenomas are not cancer but may rarely become cancer and spread to the lungs or lymph nodes in the neck.

## Causes and risk factors for childhood thyroid cancer

Thyroid cancer in children is caused by certain changes to the way thyroid cells function, especially how they grow and divide into new cells. Often, the exact cause of these cell changes is unknown. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Not every child with one or more of these risk factors will develop thyroid cancer. And it will develop in some children who don't have a known risk factor.

Risk factors for childhood thyroid cancer include:

- being exposed to radiation, such as from diagnostic tests, radiation treatment, or radiation in the environment
- having autoimmune thyroiditis
- having certain genetic syndromes, such as:
  - multiple endocrine neoplasia type 2A (MEN2A) syndrome
  - multiple endocrine neoplasia type 2B (MEN2B) syndrome
- having a family history of thyroid cancer, including:
  - APC-associated polyposis
  - DICER1 syndrome
  - Carney complex
  - PTEN hamartoma tumor syndrome
  - Werner syndrome

Talk with your child's doctor if you think your child may be at risk for thyroid cancer.

## Genetic counseling for children with thyroid cancer

It is not always clear from the family medical history whether a condition is inherited. Genetic counseling can assess the likelihood that your child's cancer is inherited and whether genetic testing is needed. Genetic testing may help explain why a child develops a rare cancer or a cancer that is usually seen in adults. Genetic counselors and other specially trained health professionals can discuss your child's diagnosis and your family's medical history to help you understand:

- the options for testing for changes in the RET, DICER1, or APC gene
- the risk of other cancers for your child
- the risk of thyroid cancer or other cancers for your child's siblings
- the risks and benefits of learning genetic information

Genetic counselors can also help you cope with your child's genetic testing results, including how to discuss the results with family members. They can advise you about whether other members of your family should receive genetic testing.

If your child has been found to have a change in the RET gene, other family members may also be tested to find out if they have an increased risk of medullary thyroid cancer. Family members, including young children, who have the changed gene may have a thyroidectomy (surgery to remove the thyroid). This can decrease the chance of developing medullary thyroid cancer.

Learn more about Genetic Testing for Inherited Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet).

## Symptoms of childhood thyroid cancer

Often thyroid cancer is found when a physical exam or an imaging test is done for another health problem. Sometimes the cancer can cause symptoms. It's important to check with your child's doctor if your child has:

- a lump in the neck
- trouble breathing
- trouble swallowing
- hoarseness or a change in the voice

Children with changes to the RET gene may have symptoms that can lead to an early diagnosis of multiple endocrine neoplasia type 2A or 2B syndrome. It's important to check with your child's doctor if your child has:

- bumps on the lips, tongue, or eyelids that do not hurt
- trouble making tears
- constipation
- Marfan syndrome (being tall and thin, with long arms, legs, fingers, and toes)

These symptoms may be caused by problems other than thyroid cancer. The only way to know is to see your child's doctor.

## Tests to diagnose childhood thyroid cancer

If your child has symptoms that suggest thyroid cancer, the doctor will need to find out if these are due to cancer or to another problem. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family medical history and do a physical exam. Depending on these results, they may recommend other tests. If your child is diagnosed with thyroid cancer, the results of these tests will help you and your child's doctor plan treatment.

The tests used to diagnose thyroid cancer may include:

### Thyroid function test

A thyroid function test checks the blood for abnormal levels of thyroid-stimulating hormone (TSH). TSH is made by the pituitary gland in the brain. It stimulates the release of thyroid hormone and controls how fast follicular thyroid cells grow. The blood may also be checked for high levels of calcitonin (a hormone made by the thyroid that decreases the amount of calcium in the blood).

### Thyroglobulin test

A thyroglobulin test checks the blood for the amount of thyroglobulin, a protein made by the thyroid gland. Thyroglobulin levels are low or absent with normal thyroid function but may be higher with thyroid cancer or other conditions.

### RET, DICER1, or APC genetic testing

A RET, DICER1, or APC genetic test checks a sample of blood, saliva, or tissue for certain changes in the RET, DICER1, or APC genes.

### Ultrasound exam

An ultrasound exam uses high-energy sound waves (ultrasound) that bounce off internal tissues or organs in the neck and make echoes. The echoes form a picture of body tissues called a sonogram. This procedure can show the size of the mass and whether it is solid or a fluid-filled cyst. Ultrasound may be used to guide a fine-needle aspiration biopsy. A complete ultrasound exam of the neck is done before surgery.

### Thyroid scan

A thyroid scan uses a small amount of a radioactive substance that is swallowed or injected. The radioactive material collects in thyroid gland cells. A special camera linked to a computer detects the radiation given off and makes pictures that show how the thyroid looks and functions and whether the cancer has spread beyond the thyroid gland. If the amount of TSH in the child's blood is low, a scan to make images of the thyroid may be done before surgery.

### CT scan (CAT scan)

A CT scan uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body, such as the neck, chest, abdomen, and brain. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).

Computed tomography (CT) scan of the head and neck. The child lies on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of the inside of the head and neck.

Computed tomography (CT) scan of the head and neck; drawing shows a child lying on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of the inside of the head and neck.

### Magnetic resonance imaging (MRI) with gadolinium

MRI uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body, such as the neck and chest. A substance called gadolinium is injected into a vein. The gadolinium collects around the cancer cells so they show up brighter in the picture. This procedure is also called nuclear magnetic resonance imaging (NMRI).

### Chest x-ray

An x-ray is a type of radiation that can go through the body and make pictures. A chest x-ray makes pictures of the organs and bones inside the chest.

### Biopsy

A biopsy is a procedure in which a sample of tissue is removed from the tumor so that a pathologist can view it under a microscope to check for signs of cancer.

- Fine-needle aspiration biopsy is the removal of thyroid tissue using a thin needle. The needle is inserted through the skin into the thyroid. Several tissue samples are removed from different parts of the thyroid. A pathologist views the tissue samples under a microscope to look for cancer cells. If it is not clear whether cancer is present, a surgical biopsy may be done.
- Surgical biopsy is the removal of the thyroid nodule or one lobe of the thyroid during surgery so the cells and tissues can be viewed under a microscope by a pathologist to check for signs of cancer.

### Whole-body thyroid scan

A whole-body thyroid scan uses a small amount of radioactive substance that is swallowed or injected. The radioactive material collects in any thyroid tissue or cancer cells remaining after surgery. Radioactive iodine is used because only thyroid cells take up iodine. A special camera detects the radiation given off by the thyroid tissue or cancer cells. This procedure is also called radioactive iodine scan or RAI scan.

## Getting a second opinion

You may want to get a second opinion to confirm your child's cancer diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the genetic test report, pathology report, slides, and scans. This doctor may agree with the first doctor, suggest changes to the treatment plan, or provide more information about your child's cancer.

To learn more about choosing a doctor and getting a second opinion, see Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your child's appointments, see Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions).

## Types of treatment for childhood thyroid cancer

### Who treats children with thyroid cancer?

A pediatric oncologist, a doctor who specializes in treating children with cancer, oversees treatment of thyroid cancer. The pediatric oncologist works with other health care providers who are experts in treating children with cancer and who specialize in certain areas of medicine. Other specialists may include:

- pediatrician
- pediatric surgeon
- radiation oncologist
- pathologist
- pediatric nurse specialist
- social worker
- rehabilitation specialist
- psychologist
- child-life specialist

There are different types of treatment for children and adolescents with thyroid cancer. You and your child's cancer care team will work together to decide treatment. Many factors will be considered, such as your child's overall health and whether the tumor is newly diagnosed or has come back.

Your child's treatment plan will include information about the cancer, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's cancer care team before treatment begins about what to expect. For help every step of the way, see our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

Treatment for thyroid cancer might include:

### Surgery

Surgery is the most common treatment for thyroid cancer. One of the following procedures may be used:

- Total thyroidectomy is the removal of the whole thyroid. Lymph nodes near the cancer may also be removed and checked under a microscope for signs of cancer.
- Near-total thyroidectomy is the removal of all but a very small part of the thyroid. Lymph nodes near the cancer may also be removed and checked under a microscope for signs of cancer.

In children, a total thyroidectomy is usually done.

Learn more about Surgery to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery).

### Radioactive iodine therapy

Follicular and papillary thyroid cancers are sometimes treated with radioactive iodine (RAI) therapy. RAI therapy may be given to children after surgery to kill any thyroid cancer cells that were not removed or to children whose tumor cannot be removed by surgery. RAI is taken by mouth and collects in any remaining thyroid tissue, including thyroid cancer cells that have spread to other places in the body. Because only thyroid tissue takes up iodine, the RAI destroys thyroid tissue and thyroid cancer cells without harming other tissue. Before a full treatment dose of RAI is given, a small test dose is given to see if the tumor takes up the iodine.

### Targeted therapy

Targeted therapy uses drugs or other substances to block the action of specific enzymes, proteins, and other molecules involved in the growth and spread of cancer cells. Targeted therapies used to treat thyroid cancer include:

- entrectinib (https://www.cancer.gov/about-cancer/treatment/drugs/entrectinib)
- larotrectinib (https://www.cancer.gov/about-cancer/treatment/drugs/larotrectinibsulfate)
- selpercatinib (https://www.cancer.gov/about-cancer/treatment/drugs/selpercatinib)
- vandetanib (https://www.cancer.gov/about-cancer/treatment/drugs/vandetanib)

Learn more about Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

### Clinical trials

Joining a clinical trial may be an option. There are different types of clinical trials for childhood cancer. For example, a treatment trial tests new treatments or new ways of using existing treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. The search allows you to filter trials based on the type of cancer, your child's age, and where the trials are being done.

Learn more at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment of newly diagnosed childhood papillary and follicular thyroid cancer

Treatment of papillary and follicular thyroid carcinoma in children may include:

- Surgery to remove all or most of the thyroid gland and sometimes lymph nodes near the thyroid gland. Radioactive iodine therapy may also be given if any thyroid cancer cells remain after surgery. Hormone replacement therapy (HRT) is given to make up for the lost thyroid hormone.
- Radioactive iodine therapy alone may be given to children whose tumor cannot be removed by surgery. HRT is given to make up for the lost thyroid hormone.

### Treatment of newly diagnosed childhood medullary thyroid cancer

Treatment of medullary thyroid cancer in children may include:

- surgery to remove the cancer
- targeted therapy (selpercatinib or vandetanib) for cancer that has continued to grow during treatment or has spread to other parts of the body

### Treatment of progressive or recurrent childhood thyroid cancer

Treatment of progressive or recurrent papillary and follicular thyroid carcinoma in children may include:

- radioactive iodine therapy
- targeted therapy (entrectinib, larotrectinib, or selpercatinib)

If the cancer comes back after treatment, your child's doctor will talk with you about what to expect and possible next steps. There might be treatment options that may shrink the cancer or control its growth. If there are no treatments, your child can receive care to control symptoms from cancer so they can be as comfortable as possible.

## Prognosis and prognostic factors for childhood thyroid cancer

If your child has been diagnosed with thyroid cancer, you likely have questions about how serious the cancer is and your child's chances of survival. The likely outcome or course of a disease is called prognosis.

The prognosis depends on:

- your child's age at the time of diagnosis
- the type of thyroid cancer
- the size of the cancer
- whether the tumor has spread to the lymph nodes or other parts of the body at the time of diagnosis
- whether the cancer was completely removed by surgery

The prognosis for most children with papillary thyroid cancer and follicular thyroid cancer is very good.

No two people are alike, and responses to treatment vary greatly. Your child's cancer care team is in the best position to talk with you about your child's prognosis.

## Side effects and late effects of treatment

Cancer treatments can cause side effects. Which side effects your child might have depends on the type of treatment they receive, the dose, and how their body reacts. Talk with your child's treatment team about which side effects to look for and ways to manage them.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Problems from cancer treatment that begin 6 months or later after treatment and continue for months or years are called late effects. Late effects of cancer treatment for childhood thyroid cancer may include:

- changes in the salivary glands
- increased risk of infection
- trouble breathing
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer)

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the effects cancer treatment can have on your child. Learn more about Late Effects of Treatment for Childhood Cancer.

## Follow-up care

It is common for thyroid cancer to recur (come back), especially in children younger than 10 years and those with cancer in the lymph nodes. Ultrasound, whole-body scan, and thyroglobulin tests may be done from time to time to check if the cancer has recurred. Lifelong follow-up of thyroid hormone levels in the blood is needed to make sure the right amount of hormone replacement therapy (HRT) is being given. Talk with your child's doctor to find out how often these tests need to be done.

## Coping with your child's cancer

When your child has cancer, every member of the family needs support. Taking care of yourself during this difficult time is important. Reach out to your child's treatment team and to people in your family and community for support. To learn more, see Support for Families: Childhood Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and the booklet Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

## Related resources

For more childhood cancer information and other general cancer resources, see:

- Thyroid Cancer Home Page (https://www.cancer.gov/types/thyroid)
- MyPART - My Pediatric and Adult Rare Tumor Network (https://www.cancer.gov/nci/pediatric-adult-rare-tumor/rare-tumors/rare-endocrine-tumor)
- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- For Survivors and Caregivers (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of childhood thyroid cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Thyroid Cancer. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/thyroid/patient/child-thyroid-treatment-pdq. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).